# Childhood Colorectal Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of pediatric colorectal cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Incidence

Carcinoma of the large bowel is rare in children and adolescents.[1] Colorectal cancer is seen in 0.5 cases per 100,000 people younger than 20 years in the United States annually.[2] Fewer than 100 cases are diagnosed in children each year in the United States.[3] From 1973 to 2006, the Surveillance, Epidemiology, and End Results (SEER) Program database recorded 174 cases of colorectal cancer in patients younger than 19 years.[4]

Colorectal carcinoma accounts for about 5% of all malignancies in people aged 15 to 29 years.[2] An analysis of SEER data identified 5,350 adolescents and young adults between the ages of 15 and 39 years with colorectal cancer from 2010 to 2015.[5]

### References

da Costa Vieira RA, Tramonte MS, Lopes LF: Colorectal carcinoma in the first decade of life: a systematic review. Int J Colorectal Dis 30 (8): 1001-6, 2015.25916603
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Saab R, Furman WL: Epidemiology and management options for colorectal cancer in children. Paediatr Drugs 10 (3): 177-92, 2008.18454570
Ferrari A, Casanova M, Massimino M, et al.: Peculiar features and tailored management of adult cancers occurring in pediatric age. Expert Rev Anticancer Ther 10 (11): 1837-51, 2010.21080807
Holowatyj AN, Lewis MA, Pannier ST, et al.: Clinicopathologic and Racial/Ethnic Differences of Colorectal Cancer Among Adolescents and Young Adults. Clin Transl Gastroenterol 10 (7): e00059, 2019.31259751

## Inflammatory Bowel Disease Associated With Colorectal Cancer

A register-based nationwide cohort study was conducted in Sweden and Denmark to assess the risk of colorectal cancer related to childhood-onset Crohn disease (n = 6,937) and ulcerative colitis (n = 8,514). Patients with Crohn disease were monitored until a median age of 27 years, and patients with ulcerative colitis were monitored until age 29 years.[1]

- During the follow-up period, 25 patients with Crohn disease (0.36%) were diagnosed with colorectal cancer, versus 43 reference individuals (0.06%).
- During the follow-up period, 113 patients with ulcerative colitis (1.33%) were diagnosed with colorectal cancer, versus 45 reference individuals (0.05%).
- The hazard ratio (HR) for colorectal cancer was 6.46 (95% confidence interval [CI], 3.95–10.6) in patients with Crohn disease and 32.5 (95% CI, 23.0–45.9) in patients with ulcerative colitis. The HR increased with decreasing age of diagnosis.
- The relative risk of colorectal cancer is very high in both childhood-onset Crohn disease and ulcerative colitis, and age at diagnosis is an additional risk factor.
- These factors are potentially important when implementing a colorectal cancer surveillance program for patients with inflammatory bowel disease.

### References

Everhov ÅH, Ludvigsson JF, Järås J, et al.: Colorectal Cancer in Childhood-onset Inflammatory Bowel Disease: A Scandinavian Register-based Cohort Study, 1969-2017. J Pediatr Gastroenterol Nutr 75 (4): 480-484, 2022.36125530

## Genetic Syndromes Associated With Colorectal Cancer

About 20% to 30% of adult patients with colorectal cancer have a significant history of familial cancer; of these, about 5% have a well-defined genetic syndrome.[1] Hereditary colorectal cancer has two well-described forms:[2,3]

- Polyposis (including familial adenomatous polyposis [FAP] and attenuated FAP, which are caused by germline pathogenic variants in the APC gene, and MUTYH-associated polyposis, which is caused by germline pathogenic variants in the MUTYH gene).
  Familial polyposis is inherited as a dominant trait, which confers a high degree of risk. Early diagnosis and surgical removal of the colon eliminates the risk of developing carcinomas of the large bowel.[4,5] Some colorectal carcinomas in young people, however, may be associated with a variant of the APC gene, which also is associated with an increased risk of brain tumors and hepatoblastoma.[6] FAP syndrome is caused by a gene variant on chromosome 5q, which normally suppresses proliferation of cells lining the intestine and later development of polyps.[7] A double-blind, placebo-controlled, randomized phase I trial in children aged 10 to 14 years with FAP reported that celecoxib at a dose of 16 mg/kg per day is safe for up to 3 months. At this dose, there was a significant decrease in the number of polyps detected by colonoscopy.[8][Level of evidence B3] The role of celecoxib in the management of FAP in children is not clear.
- Lynch syndrome (often referred to as hereditary nonpolyposis colorectal cancer), which is caused by germline pathogenic variants in DNA mismatch repair genes (MLH1, MSH2, MSH6, and PMS2) and EPCAM.
  Despite the increased risk of multiple malignancies in families with Lynch syndrome, the risk of malignant neoplasms during childhood in those families does not seem to be increased when compared with the risk in children from families with colorectal carcinoma that is not associated with Lynch syndrome.[9]

Other colorectal cancer syndromes and their associated genes include oligopolyposis (POLE, POLD1),[3] NTHL1,[10] juvenile polyposis syndrome (BMPR1A, SMAD4), Cowden syndrome (PTEN), and Peutz-Jeghers syndrome (STK11).[2] For more information about these syndromes, see Genetics of Colorectal Cancer

Another tumor suppressor gene on chromosome 18 is associated with progression of polyps to malignant tumors. Multiple colon carcinomas have been associated with neurofibromatosis type I and several other rare syndromes.[11]

In a cohort study of 201 patients with constitutional mismatch repair deficiency, 59 developed colorectal cancer at a median age of 20.1 years (range, 13.9–24.9 years). The cumulative incidence of gastrointestinal cancers by age 20 years was 42% (95% confidence interval, 30%–54%).[12]

The incidence of these genetic syndromes in children is not well defined, but several studies have examined it, as follows:

- In one review, 16% of patients younger than 40 years had a predisposing factor for the development of colorectal cancer.[13]
- A later study documented immunohistochemical evidence of mismatch repair deficiency in 31% of colorectal carcinoma samples in patients aged 30 years or younger.[14]
- A retrospective review of patients younger than 18 years in Germany identified 31 patients with colorectal carcinoma.[15] Eleven of the 26 patients who were tested for a genetic predisposition syndrome tested positive (eight cases of Lynch syndrome, one patient with FAP, and two patients with constitutional mismatch repair deficiency). When compared with the patients without a genetic predisposition syndrome, the 11 patients with a genetic predisposition syndrome presented with more localized disease, allowing complete surgical resection and improved outcome (100% survival rate).

### References

Gatalica Z, Torlakovic E: Pathology of the hereditary colorectal carcinoma. Fam Cancer 7 (1): 15-26, 2008.17564815
Hampel H: Genetic testing for hereditary colorectal cancer. Surg Oncol Clin N Am 18 (4): 687-703, 2009.19793575
Briggs S, Tomlinson I: Germline and somatic polymerase ε and δ mutations define a new class of hypermutated colorectal and endometrial cancers. J Pathol 230 (2): 148-53, 2013.23447401
Erdman SH: Pediatric adenomatous polyposis syndromes: an update. Curr Gastroenterol Rep 9 (3): 237-44, 2007.17511923
Vitellaro M, Piozzi G, Signoroni S, et al.: Short-term and long-term outcomes after preventive surgery in adolescent patients with familial adenomatous polyposis. Pediatr Blood Cancer 67 (3): e28110, 2020.31802619
Turcot J, Despres JP, St Pierre F: Malignant tumors of the central nervous system associated with familial polyposis of the colon: report of two cases. Dis Colon Rectum 2: 465-8, 1959 Sep-Oct.13839882
Vogelstein B, Fearon ER, Hamilton SR, et al.: Genetic alterations during colorectal-tumor development. N Engl J Med 319 (9): 525-32, 1988.2841597 88302297
Lynch PM, Ayers GD, Hawk E, et al.: The safety and efficacy of celecoxib in children with familial adenomatous polyposis. Am J Gastroenterol 105 (6): 1437-43, 2010.20234350
Heath JA, Reece JC, Buchanan DD, et al.: Childhood cancers in families with and without Lynch syndrome. Fam Cancer 14 (4): 545-51, 2015.25963852
Broderick P, Dobbins SE, Chubb D, et al.: Validation of Recently Proposed Colorectal Cancer Susceptibility Gene Variants in an Analysis of Families and Patients-a Systematic Review. Gastroenterology 152 (1): 75-77.e4, 2017.27713038
Pratt CB, Jane JA: Multiple colorectal carcinomas, polyposis coli, and neurofibromatosis, followed by multiple glioblastoma multiforme. J Natl Cancer Inst 83 (12): 880-1, 1991.1648143 91287140
Ercan AB, Aronson M, Fernandez NR, et al.: Clinical and biological landscape of constitutional mismatch-repair deficiency syndrome: an International Replication Repair Deficiency Consortium cohort study. Lancet Oncol 25 (5): 668-682, 2024.38552658
O'Connell JB, Maggard MA, Livingston EH, et al.: Colorectal cancer in the young. Am J Surg 187 (3): 343-8, 2004.15006562
Goel A, Nagasaka T, Spiegel J, et al.: Low frequency of Lynch syndrome among young patients with non-familial colorectal cancer. Clin Gastroenterol Hepatol 8 (11): 966-71, 2010.20655395
Weber ML, Schneider DT, Offenmüller S, et al.: Pediatric Colorectal Carcinoma is Associated With Excellent Outcome in the Context of Cancer Predisposition Syndromes. Pediatr Blood Cancer 63 (4): 611-7, 2016.26575411

## Clinical Presentation

Colorectal tumors can occur in any location in the large bowel. Large series and reviews suggest that ascending and descending colon tumors are each seen in approximately 30% of cases, with rectal tumors occurring in approximately 25% of cases.[1-3]

Right-sided tumors (cecum to transverse colon) were diagnosed in 28.6% of adolescent and young adult (AYA) cases. The proportion of right-sided colorectal cancers differed significantly by age group at diagnosis (38.3% of AYA patients aged 15–19 years vs. 27.3% of AYA patients aged 35–39 years). The incidence of mucinous adenocarcinoma and signet ring cell carcinoma histopathological subtypes was higher in younger patients.

Tumors of the ascending colon (right colon) may cause more subtle symptoms but are often associated with the following:

- Abdominal mass.
- Weight loss.
- Decreased appetite.
- Blood in the stool.
- Iron-deficiency anemia.

Signs and symptoms in children with descending colon tumors include the following:

- Abdominal pain (most common).
- Rectal bleeding.
- Change in bowel habits.
- Weight loss.
- Nausea and vomiting.

The median duration of symptoms before diagnosis was about 3 months in one series.[4,5]

Changes in bowel habits may be associated with tumors of the rectum or lower colon.

Any tumor that causes complete obstruction of the large bowel can cause bowel perforation and spread of the tumor cells within the abdominal cavity.

### References

Kaplan MA, Isikdogan A, Gumus M, et al.: Childhood, adolescents, and young adults (≤25 y) colorectal cancer: study of Anatolian Society of Medical Oncology. J Pediatr Hematol Oncol 35 (2): 83-9, 2013.23337551
Kim G, Baik SH, Lee KY, et al.: Colon carcinoma in childhood: review of the literature with four case reports. Int J Colorectal Dis 28 (2): 157-64, 2013.23099637
Sultan I, Rodriguez-Galindo C, El-Taani H, et al.: Distinct features of colorectal cancer in children and adolescents: a population-based study of 159 cases. Cancer 116 (3): 758-65, 2010.19957323
Hill DA, Furman WL, Billups CA, et al.: Colorectal carcinoma in childhood and adolescence: a clinicopathologic review. J Clin Oncol 25 (36): 5808-14, 2007.18089879
Saab R, Furman WL: Epidemiology and management options for colorectal cancer in children. Paediatr Drugs 10 (3): 177-92, 2008.18454570

## Diagnostic Evaluation

Diagnostic studies include the following:[1,2]

- Examination of the stool for blood.
- Studies of liver and kidney function.
- Measurement of carcinoembryonic antigen (CEA).
- Various medical imaging studies, including direct examination using colonoscopy to detect polyps in the large bowel. Other conventional radiographic studies include barium enema or video-capsule endoscopy followed by computed tomography of the chest and bone scans.[3]

### References

Pratt CB, Rao BN, Merchant TE, et al.: Treatment of colorectal carcinoma in adolescents and young adults with surgery, 5-fluorouracil/leucovorin/interferon-alpha 2a and radiation therapy. Med Pediatr Oncol 32 (6): 459-60, 1999.10358711 99286763
Kauffman WM, Jenkins JJ, Helton K, et al.: Imaging features of ovarian metastases from colonic adenocarcinoma in adolescents. Pediatr Radiol 25 (4): 286-8, 1995.7567240 96015667
Postgate A, Hyer W, Phillips R, et al.: Feasibility of video capsule endoscopy in the management of children with Peutz-Jeghers syndrome: a blinded comparison with barium enterography for the detection of small bowel polyps. J Pediatr Gastroenterol Nutr 49 (4): 417-23, 2009.19543117

## Histology and Genomic Alterations

There is a higher incidence of mucinous adenocarcinoma in pediatric and adolescent patients (40%–50%), with many lesions of the signet ring cell type.[1-5] In comparison, only about 15% of adult lesions involve this histology. Tumors with mucinous histology arise from the surface of the bowel, usually at the site of an adenomatous polyp.[5] The tumor may extend into the muscle layer surrounding the bowel, or the tumor may perforate the bowel entirely and seed through the spaces around the bowel, including intra-abdominal fat, lymph nodes, liver, ovaries, and the surface of other loops of bowel. A high incidence of metastasis involving the pelvis, ovaries, or both may be present in girls.[6]

The tumors of younger patients with the mucinous histological variant may not respond well to chemotherapy. In the adolescent and young adult (AYA) population with this histology, there is a higher incidence of signet ring cells, microsatellite instability, and variants in the mismatch repair genes.[5,7,8]

Colorectal cancers in younger patients with noninherited sporadic tumors often lack KRAS variants and other cytogenetic anomalies seen in older patients.[9] A genomic study used exome and RNA sequencing to identify variant differences in colorectal carcinomas of adults (n = 30), AYA patients (n = 30), and children (n = 2). Five of the identified genes (MYCBP2, BRCA2, PHLPP1, TOPORS, and ATR) were more frequently altered in AYA patients. These genes contained a damaging variant and were identified through whole-exome sequencing and RNA sequencing. In addition, higher variant rates in DNA mismatch and DNA repair pathways, such as MSH2, BRCA2, and RAD9B, were more prevalent in AYA samples, but the results were not validated by RNA sequencing.[10]

### References

Saab R, Furman WL: Epidemiology and management options for colorectal cancer in children. Paediatr Drugs 10 (3): 177-92, 2008.18454570
Hill DA, Furman WL, Billups CA, et al.: Colorectal carcinoma in childhood and adolescence: a clinicopathologic review. J Clin Oncol 25 (36): 5808-14, 2007.18089879
Ferrari A, Rognone A, Casanova M, et al.: Colorectal carcinoma in children and adolescents: the experience of the Istituto Nazionale Tumori of Milan, Italy. Pediatr Blood Cancer 50 (3): 588-93, 2008.17405155
da Costa Vieira RA, Tramonte MS, Lopes LF: Colorectal carcinoma in the first decade of life: a systematic review. Int J Colorectal Dis 30 (8): 1001-6, 2015.25916603
Poles GC, Clark DE, Mayo SW, et al.: Colorectal carcinoma in pediatric patients: A comparison with adult tumors, treatment and outcomes from the National Cancer Database. J Pediatr Surg 51 (7): 1061-6, 2016.26703433
Kauffman WM, Jenkins JJ, Helton K, et al.: Imaging features of ovarian metastases from colonic adenocarcinoma in adolescents. Pediatr Radiol 25 (4): 286-8, 1995.7567240 96015667
Tricoli JV, Seibel NL, Blair DG, et al.: Unique characteristics of adolescent and young adult acute lymphoblastic leukemia, breast cancer, and colon cancer. J Natl Cancer Inst 103 (8): 628-35, 2011.21436065
Khan SA, Morris M, Idrees K, et al.: Colorectal cancer in the very young: a comparative study of tumor markers, pathology and survival in early onset and adult onset patients. J Pediatr Surg 51 (11): 1812-1817, 2016.27558481
Bleyer A, Barr R, Hayes-Lattin B, et al.: The distinctive biology of cancer in adolescents and young adults. Nat Rev Cancer 8 (4): 288-98, 2008.18354417
Tricoli JV, Boardman LA, Patidar R, et al.: A mutational comparison of adult and adolescent and young adult (AYA) colon cancer. Cancer 124 (5): 1070-1082, 2018.29194591

## Prognosis and Prognostic Factors

Several retrospective studies of adolescent and young adult (AYA) patients with colorectal cancer are summarized.

1. An analysis from the National Cancer Database, which tracks outcomes of patients with malignancies across 1,500 Commission on Cancer–accredited facilities, identified 531,462 patients with colon cancer between 2004 and 2016. There were 947 patients aged 25 years or younger.[1]
  - Compared with patients older than 25 years, younger patients had more advanced disease (stage III: 44.4% vs. 33.4%; stage IV: 27.5% vs.15.3%) and higher rates of total colectomy (8.9% vs. 2.7%) and proctocolectomy (5.0% vs. 0.0%).
  - Stage-for-stage, the 5-year survival rates were higher in patients aged 25 years or younger than in those older than 25 years.
  - This study had several limitations. The data presented in this study are registry based, and not all data points were collected for all patients. In addition, only 30% of hospitals in the United States are accredited by the Commission on Cancer.
2. A retrospective analysis of patients examined at three tertiary referral hospitals in China between September 2000 and July 2019 identified 70 patients younger than 20 years with colorectal carcinoma.[2]
  - The most common primary tumor location was the left hemicolon (35.7%).
  - The prominent pathological types were mucinous adenocarcinoma (22.9%) and signet ring cell carcinoma (22.9%).
  - Nearly one-half (47.1%) of the patients presented with distant metastasis at diagnosis.
  - Of the patients who received additional tumor testing, 23.8% (5 of 21) had deficient mismatch repair protein expression and 71.4% (5 of 7) had microsatellite instability-high disease.
3. Another study from the National Cancer Database described the features and outcomes of 918 pediatric patients (aged <21 years), 157,577 young adult patients (aged 22–50 years), and 1,303,655 older adult patients (aged >50 years) with colorectal cancer.[3]
  - Signet ring, mucinous, and poorly differentiated histology were more commonly seen in pediatric patients.
  - Children and older patients had poorer 5-year overall survival rates than early-onset adults when adjusted for other covariates, such as stage and pathology.
  - Age younger than 21 years was a significant predictor of mortality caused by colon and rectal cancer.
  - As with other publications from this group, the data presented in this study are registry based, which underestimates several variables, including outpatient therapy and predisposing factors and symptoms. This limitation may explain why a specific course for inferior outcomes in patients younger than 21 years could not be identified.
4. A single-institution retrospective review compared 94 pediatric and young adult patients (aged <25 years) with 765 older patients.[4]
  - This study reported a worse prognosis (stage-for-stage) and a higher rate of peritoneal metastasis for the younger patients.
  - Nearly 30% of the pediatric patients in the cohort were known to have a predisposing cancer susceptibility diagnosis, most commonly Lynch syndrome, familial adenomatous polyposis, or Li-Fraumeni syndrome.
5. A pediatric oncology group in the Netherlands performed a retrospective analysis of adolescents and adults aged 25 years or younger with colorectal cancer. They analyzed clinical data and molecular and genetic features of colorectal tumor tissues from 139 AYA patients (age, ≤25 years; median age, 23 years; 58% male), collected between 2000 and 2017.[5]
  - Mucinous and/or signet ring cell components were observed in 33% of tumor samples.
  - A genetic tumor-risk syndrome was confirmed in 39% of the patients.
  - Factors associated with shorter survival time included younger age at diagnosis, signet ring cell carcinoma histology, the absence of a genetic tumor-risk syndrome, and advanced stage of disease at diagnosis.

Survival is consistent with the advanced stage of disease observed in most children with colorectal cancer, with an overall mortality rate of approximately 70%. For patients with a complete surgical resection or for those with low-stage/localized disease, survival is significantly prolonged, with the potential for cure.[6]

### References

Akinkuotu AC, Maduekwe UN, Hayes-Jordan A: Surgical outcomes and survival rates of colon cancer in children and young adults. Am J Surg 221 (4): 718-724, 2021.33678398
Zhou C, Xiao W, Wang X, et al.: Colorectal cancer under 20 years old: a retrospective analysis from three tertiary hospitals. J Cancer Res Clin Oncol 147 (4): 1145-1155, 2021.32968876
Poles GC, Clark DE, Mayo SW, et al.: Colorectal carcinoma in pediatric patients: A comparison with adult tumors, treatment and outcomes from the National Cancer Database. J Pediatr Surg 51 (7): 1061-6, 2016.26703433
Hayes-Jordan AA, Sandler G, Malakorn S, et al.: Colon Cancer in Patients Under 25 Years Old: A Different Disease? J Am Coll Surg 230 (4): 648-656, 2020.32092356
de Voer RM, Diets IJ, van der Post RS, et al.: Clinical, Pathology, Genetic, and Molecular Features of Colorectal Tumors in Adolescents and Adults 25 Years or Younger. Clin Gastroenterol Hepatol 19 (8): 1642-1651.e8, 2021.32585361
Kaplan MA, Isikdogan A, Gumus M, et al.: Childhood, adolescents, and young adults (≤25 y) colorectal cancer: study of Anatolian Society of Medical Oncology. J Pediatr Hematol Oncol 35 (2): 83-9, 2013.23337551

## Staging

Most reports suggest that children present with more advanced disease than adults, with 80% to 90% of pediatric patients presenting with Dukes stage C/D or TNM stage III/IV disease.[1-16] For more information, see the Stage Information for Colon Cancer section in Colon Cancer Treatment.

### References

Hill DA, Furman WL, Billups CA, et al.: Colorectal carcinoma in childhood and adolescence: a clinicopathologic review. J Clin Oncol 25 (36): 5808-14, 2007.18089879
Saab R, Furman WL: Epidemiology and management options for colorectal cancer in children. Paediatr Drugs 10 (3): 177-92, 2008.18454570
Chantada GL, Perelli VB, Lombardi MG, et al.: Colorectal carcinoma in children, adolescents, and young adults. J Pediatr Hematol Oncol 27 (1): 39-41, 2005.15654277
Durno C, Aronson M, Bapat B, et al.: Family history and molecular features of children, adolescents, and young adults with colorectal carcinoma. Gut 54 (8): 1146-50, 2005.15845562
Ferrari A, Rognone A, Casanova M, et al.: Colorectal carcinoma in children and adolescents: the experience of the Istituto Nazionale Tumori of Milan, Italy. Pediatr Blood Cancer 50 (3): 588-93, 2008.17405155
Karnak I, Ciftci AO, Senocak ME, et al.: Colorectal carcinoma in children. J Pediatr Surg 34 (10): 1499-504, 1999.10549756
LaQuaglia MP, Heller G, Filippa DA, et al.: Prognostic factors and outcome in patients 21 years and under with colorectal carcinoma. J Pediatr Surg 27 (8): 1085-9; discussion 1089-90, 1992.1403541
Radhakrishnan CN, Bruce J: Colorectal cancers in children without any predisposing factors. A report of eight cases and review of the literature. Eur J Pediatr Surg 13 (1): 66-8, 2003.12664421
Sharma AK, Gupta CR: Colorectal cancer in children: case report and review of literature. Trop Gastroenterol 22 (1): 36-9, 2001 Jan-Mar.11398246
Taguchi T, Suita S, Hirata Y, et al.: Carcinoma of the colon in children: a case report and review of 41 Japanese cases. J Pediatr Gastroenterol Nutr 12 (3): 394-9, 1991.2072235
Pratt CB, Rao BN, Merchant TE, et al.: Treatment of colorectal carcinoma in adolescents and young adults with surgery, 5-fluorouracil/leucovorin/interferon-alpha 2a and radiation therapy. Med Pediatr Oncol 32 (6): 459-60, 1999.10358711 99286763
Sultan I, Rodriguez-Galindo C, El-Taani H, et al.: Distinct features of colorectal cancer in children and adolescents: a population-based study of 159 cases. Cancer 116 (3): 758-65, 2010.19957323
Kaplan MA, Isikdogan A, Gumus M, et al.: Childhood, adolescents, and young adults (≤25 y) colorectal cancer: study of Anatolian Society of Medical Oncology. J Pediatr Hematol Oncol 35 (2): 83-9, 2013.23337551
Kim G, Baik SH, Lee KY, et al.: Colon carcinoma in childhood: review of the literature with four case reports. Int J Colorectal Dis 28 (2): 157-64, 2013.23099637
Poles GC, Clark DE, Mayo SW, et al.: Colorectal carcinoma in pediatric patients: A comparison with adult tumors, treatment and outcomes from the National Cancer Database. J Pediatr Surg 51 (7): 1061-6, 2016.26703433
Akinkuotu AC, Maduekwe UN, Hayes-Jordan A: Surgical outcomes and survival rates of colon cancer in children and young adults. Am J Surg 221 (4): 718-724, 2021.33678398

## Special Considerations for the Treatment of Children With Cancer

Cancer in children and adolescents is rare, although the overall incidence has slowly increased since 1975.[1] Children and adolescents with cancer should be referred to medical centers that have a multidisciplinary team of cancer specialists with experience treating the cancers that occur during childhood and adolescence. This multidisciplinary team approach incorporates the skills of the following pediatric specialists and others to ensure that children receive treatment, supportive care, and rehabilitation to achieve optimal survival and quality of life:

- Primary care physicians.
- Pediatric surgeons.
- Pathologists.
- Pediatric radiation oncologists.
- Pediatric medical oncologists and hematologists.
- Ophthalmologists.
- Rehabilitation specialists.
- Pediatric oncology nurses.
- Social workers.
- Child-life professionals.
- Psychologists.
- Nutritionists.

For specific information about supportive care for children and adolescents with cancer, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

The American Academy of Pediatrics has outlined guidelines for pediatric cancer centers and their role in the treatment of children and adolescents with cancer.[2] At these centers, clinical trials are available for most types of cancer that occur in children and adolescents, and the opportunity to participate is offered to most patients and their families. Clinical trials for children and adolescents diagnosed with cancer are generally designed to compare potentially better therapy with current standard therapy. Other types of clinical trials test novel therapies when there is no standard therapy for a cancer diagnosis. Most of the progress in identifying curative therapies for childhood cancers has been achieved through clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

Dramatic improvements in survival have been achieved for children and adolescents with cancer. Between 1975 and 2020, childhood cancer mortality decreased by more than 50%.[3-5] Childhood and adolescent cancer survivors require close monitoring because side effects of cancer therapy may persist or develop months or years after treatment. For information about the incidence, type, and monitoring of late effects in childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

Childhood cancer is a rare disease, with about 15,000 cases diagnosed annually in the United States in individuals younger than 20 years.[6] The U.S. Rare Diseases Act of 2002 (https://www.congress.gov/107/plaws/publ280/PLAW-107publ280.pdf) defines a rare disease as one that affects populations smaller than 200,000 people in the United States. Therefore, all pediatric cancers are considered rare.

The designation of a rare tumor is not uniform among pediatric and adult groups. In adults, rare cancers are defined as those with an annual incidence of fewer than six cases per 100,000 people. They account for up to 24% of all cancers diagnosed in the European Union and about 20% of all cancers diagnosed in the United States.[7,8] In children and adolescents, the designation of a rare tumor is not uniform among international groups, as follows:

- A consensus effort between the European Union Joint Action on Rare Cancers and the European Cooperative Study Group for Rare Pediatric Cancers estimated that 11% of all cancers in patients younger than 20 years could be categorized as very rare. This consensus group defined very rare cancers as those with annual incidences of fewer than two cases per 1 million people. However, three additional histologies (thyroid carcinoma, melanoma, and testicular cancer) with incidences of more than two cases per 1 million people were also included in the very rare group due to a lack of knowledge and expertise in the management of these tumors.[9]
- The Children's Oncology Group defines rare pediatric cancers as those listed in the International Classification of Childhood Cancer subgroup XI, which includes thyroid cancers, melanomas and nonmelanoma skin cancers, and multiple types of carcinomas (e.g., adrenocortical carcinomas, nasopharyngeal carcinomas, and most adult-type carcinomas such as breast cancers and colorectal cancers).[10] These diagnoses account for about 5% of the cancers diagnosed in children aged 0 to 14 years and about 27% of the cancers diagnosed in adolescents aged 15 to 19 years.[4]
  Most cancers in subgroup XI are either melanomas or thyroid cancers, with other cancer types accounting for only 2% of the cancers diagnosed in children aged 0 to 14 years and 9.3% of the cancers diagnosed in adolescents aged 15 to 19 years.

These rare cancers are extremely challenging to study because of the relatively few patients with any individual diagnosis, the predominance of rare cancers in the adolescent population, and the small number of clinical trials for adolescents with rare cancers.

Information about these tumors may also be found in sources relevant to adults with cancer, such as Colon Cancer Treatment and Rectal Cancer Treatment.

### References

Smith MA, Seibel NL, Altekruse SF, et al.: Outcomes for children and adolescents with cancer: challenges for the twenty-first century. J Clin Oncol 28 (15): 2625-34, 2010.20404250
American Academy of Pediatrics: Standards for pediatric cancer centers. Pediatrics 134 (2): 410-4, 2014. Also available online (https://pediatrics.aappublications.org/content/134/2/410). Last accessed February 25, 2025.
Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Ward E, DeSantis C, Robbins A, et al.: Childhood and adolescent cancer statistics, 2014. CA Cancer J Clin 64 (2): 83-103, 2014 Mar-Apr.24488779
Gatta G, Capocaccia R, Botta L, et al.: Burden and centralised treatment in Europe of rare tumours: results of RARECAREnet-a population-based study. Lancet Oncol 18 (8): 1022-1039, 2017.28687376
DeSantis CE, Kramer JL, Jemal A: The burden of rare cancers in the United States. CA Cancer J Clin 67 (4): 261-272, 2017.28542893
Ferrari A, Brecht IB, Gatta G, et al.: Defining and listing very rare cancers of paediatric age: consensus of the Joint Action on Rare Cancers in cooperation with the European Cooperative Study Group for Pediatric Rare Tumors. Eur J Cancer 110: 120-126, 2019.30785015
Pappo AS, Krailo M, Chen Z, et al.: Infrequent tumor initiative of the Children's Oncology Group: initial lessons learned and their impact on future plans. J Clin Oncol 28 (33): 5011-6, 2010.20956621

## Treatment of Childhood Colorectal Cancer

Most pediatric patients with colorectal cancer present with evidence of metastatic disease,[1] either as gross tumor or as microscopic deposits in lymph nodes, on the surface of the bowel, or on intra-abdominal organs.[2,3]

Treatment options for childhood colorectal cancer include the following:

1. Surgery.
2. Radiation therapy and chemotherapy.
3. Other agents.

### Surgery

Complete surgical excision is the most important prognostic factor and the primary goal of surgery, but it is often impossible. Removal of large portions of tumor provides little benefit for those with extensive metastatic disease.[4] Most patients with microscopic metastatic disease generally develop gross metastatic disease. Few individuals with metastatic disease at diagnosis become long-term survivors.

### Radiation Therapy and Chemotherapy

Current therapy includes the use of radiation for rectal and lower colon tumors, in conjunction with chemotherapy using fluorouracil (5-FU) with leucovorin.[5] Other agents, including irinotecan, may be of value.[1][Level of evidence C1]

A review of nine clinical trials involving 138 patients younger than 40 years demonstrated that the use of combination chemotherapy improved progression-free survival and overall survival (OS) in these patients. Furthermore, OS and response rates to chemotherapy were similar to those observed in older patients.[6][Level of evidence B4]

No significant benefit has been determined for interferon-alfa given in conjunction with 5-FU/leucovorin.[7]

### Other Agents

No prospective pediatric clinical trials have been conducted using checkpoint inhibitors. However, the U.S. Food and Drug Administration has granted accelerated approval to nivolumab for patients aged 12 years and older with microsatellite instability-high (MSI-H) or mismatch repair deficient metastatic colorectal cancer that has progressed following treatment with combination fluoropyrimidine, oxaliplatin, and irinotecan. This approval was based on extrapolation of the results of the CheckMate 142 (https://www.cancer.gov/clinicaltrials/NCT02060188) trial. The trial showed an objective response rate of 31% and a disease control rate of 69% in patients with MSI-H or mismatch repair deficient colorectal cancers that had progressed after a regimen of fluoropyrimidine, oxaliplatin, and irinotecan.[8]

Pembrolizumab has also been approved for adult and pediatric patients with unresectable or metastatic MSI-H or mismatch repair deficient cancer, including colorectal cancer that has progressed after fluoropyrimidine, oxaliplatin, and irinotecan therapy. This approval was based on the KEYNOTE-164 (https://www.cancer.gov/clinicaltrials/NCT02460198) trial, which demonstrated an objective response rate of 33% in patients with MSI-H or mismatch repair deficient metastatic colorectal cancer.[9] The approval was also based on the results of the KEYNOTE-117 (https://www.cancer.gov/clinicaltrials/NCT02546986) trial, which included 307 treatment-naive patients with MSI-H or mismatch repair deficient colorectal cancer who were randomly assigned to receive pembrolizumab or a 5-FU–containing regimen. The trial showed that pembrolizumab was superior to chemotherapy, with respect to progression-free survival (median, 16.5 vs. 8.2 months; hazard ratio, 0.60; 95% confidence interval, 0.45–0.80; P = .0002).[10]

Other active agents used in adults include oxaliplatin, bevacizumab, panitumumab, cetuximab, aflibercept, and regorafenib.[11-14]

### References

Hill DA, Furman WL, Billups CA, et al.: Colorectal carcinoma in childhood and adolescence: a clinicopathologic review. J Clin Oncol 25 (36): 5808-14, 2007.18089879
Ferrari A, Rognone A, Casanova M, et al.: Colorectal carcinoma in children and adolescents: the experience of the Istituto Nazionale Tumori of Milan, Italy. Pediatr Blood Cancer 50 (3): 588-93, 2008.17405155
Chantada GL, Perelli VB, Lombardi MG, et al.: Colorectal carcinoma in children, adolescents, and young adults. J Pediatr Hematol Oncol 27 (1): 39-41, 2005.15654277
Saab R, Furman WL: Epidemiology and management options for colorectal cancer in children. Paediatr Drugs 10 (3): 177-92, 2008.18454570
Madajewicz S, Petrelli N, Rustum YM, et al.: Phase I-II trial of high-dose calcium leucovorin and 5-fluorouracil in advanced colorectal cancer. Cancer Res 44 (10): 4667-9, 1984.6331882 84282401
Blanke CD, Bot BM, Thomas DM, et al.: Impact of young age on treatment efficacy and safety in advanced colorectal cancer: a pooled analysis of patients from nine first-line phase III chemotherapy trials. J Clin Oncol 29 (20): 2781-6, 2011.21646604
Wolmark N, Bryant J, Smith R, et al.: Adjuvant 5-fluorouracil and leucovorin with or without interferon alfa-2a in colon carcinoma: National Surgical Adjuvant Breast and Bowel Project protocol C-05. J Natl Cancer Inst 90 (23): 1810-6, 1998.9839521 99053256
Overman MJ, McDermott R, Leach JL, et al.: Nivolumab in patients with metastatic DNA mismatch repair-deficient or microsatellite instability-high colorectal cancer (CheckMate 142): an open-label, multicentre, phase 2 study. Lancet Oncol 18 (9): 1182-1191, 2017.28734759
Le DT, Kim TW, Van Cutsem E, et al.: Phase II Open-Label Study of Pembrolizumab in Treatment-Refractory, Microsatellite Instability-High/Mismatch Repair-Deficient Metastatic Colorectal Cancer: KEYNOTE-164. J Clin Oncol 38 (1): 11-19, 2020.31725351
André T, Shiu KK, Kim TW, et al.: Pembrolizumab in Microsatellite-Instability-High Advanced Colorectal Cancer. N Engl J Med 383 (23): 2207-2218, 2020.33264544
Saltz LB, Clarke S, Díaz-Rubio E, et al.: Bevacizumab in combination with oxaliplatin-based chemotherapy as first-line therapy in metastatic colorectal cancer: a randomized phase III study. J Clin Oncol 26 (12): 2013-9, 2008.18421054
Heinemann V, von Weikersthal LF, Decker T, et al.: FOLFIRI plus cetuximab versus FOLFIRI plus bevacizumab as first-line treatment for patients with metastatic colorectal cancer (FIRE-3): a randomised, open-label, phase 3 trial. Lancet Oncol 15 (10): 1065-75, 2014.25088940
Van Cutsem E, Tabernero J, Lakomy R, et al.: Addition of aflibercept to fluorouracil, leucovorin, and irinotecan improves survival in a phase III randomized trial in patients with metastatic colorectal cancer previously treated with an oxaliplatin-based regimen. J Clin Oncol 30 (28): 3499-506, 2012.22949147
Grothey A, Van Cutsem E, Sobrero A, et al.: Regorafenib monotherapy for previously treated metastatic colorectal cancer (CORRECT): an international, multicentre, randomised, placebo-controlled, phase 3 trial. Lancet 381 (9863): 303-12, 2013.23177514

## Treatment Options Under Clinical Evaluation for Childhood Colorectal Cancer

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

## Latest Updates to This Summary (08/27/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This summary was comprehensively reviewed.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of pediatric colorectal cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Colorectal Cancer Treatment are:

- Denise Adams, MD (Children's Hospital Boston)
- Karen J. Marcus, MD, FACR (Dana-Farber of Boston Children's Cancer Center and Blood Disorders Harvard Medical School)
- William H. Meyer, MD
- Paul A. Meyers, MD (Memorial Sloan-Kettering Cancer Center)
- Thomas A. Olson, MD (Aflac Cancer and Blood Disorders Center of Children's Healthcare of Atlanta - Egleston Campus)
- Alberto S. Pappo, MD (St. Jude Children's Research Hospital)
- D. Williams Parsons, MD, PhD (Texas Children's Hospital)
- Arthur Kim Ritchey, MD (Children's Hospital of Pittsburgh of UPMC)
- Carlos Rodriguez-Galindo, MD (St. Jude Children's Research Hospital)
- Stephen J. Shochat, MD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Colorectal Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/colorectal/hp/child-colorectal-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 31661210]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).